# Curcumin (Curcuma, Turmeric) and Cancer (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of curcumin (curcuma, turmeric) in the treatment of people with cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

This cancer information summary provides an overview of the use of curcumin as a treatment for people with cancer.

This summary contains the following key information:

- Curcumin (diarylheptanoid) is one member of a group of natural compounds called curcuminoids, derived from the rhizome of Curcuma longa, an East Indian plant, contained in an extract commonly called turmeric.
- Turmeric has a long history of therapeutic application in traditional Asian medicine.
- Extensive research over the past two decades suggests that curcuminoids, the active ingredient in turmeric (C. longa), interfere with multiple cell signaling pathways, providing support for the potential role of curcumin in modulating cancer development and progression.
- With varying formulations and doses tested in phase I clinical trials, there is evidence of bioavailability of curcumin and curcumin conjugates in plasma, urine, and tissue.
- Results from early-phase trials of curcumin-containing products in the chemoprevention of colon, oral, and hepatic carcinoma appear promising. However, the findings from these early trials have to be confirmed in well-powered trials evaluating safety and effectiveness as indicated by modulation of clinical outcomes.
- Data from early-phase trials of the safety and effectiveness of curcumin-containing products in cancer treatment are at most from pilot trials that targeted various stages of cancer and cancer patient populations, and utilized different formulations and doses of curcumin and durations of intervention. Thus, the evidence is currently inadequate to recommend curcumin-containing products for the treatment of cancer.
- Data from early-phase trials of the safety and effectiveness of curcumin-containing products as adjuncts to traditional cancer therapies are from pilot trials that had small sample sizes, targeted various stages of cancer and cancer patient populations, and utilized different formulations and doses of curcumin and durations of intervention. Thus, the evidence is currently inadequate to recommend curcumin-containing products to be used as adjuncts for the treatment of cancer.
- Data from early-phase trials on the use of curcumin formulations to ameliorate cancer treatment–related effects have demonstrated (a) improved oxidative status in patients who received chemotherapy and radiation therapy, (b) delayed onset and severity of mucositis, (c) reduced severity of radiation dermatitis and (d) improved quality of life, without adverse effects with curcumin-containing products at these doses. However, these studies were short in duration and used varying doses and formulations of curcumin. Thus, these results should be interpreted with caution. The findings from these early trials have to be confirmed in well-powered trials evaluating safety or effectiveness.

## General Information and History

Curcumin is a member of the diarylheptanoid class of natural products (curcuminoids) derived from the rhizome of Curcuma longa L., an East Indian plant, commonly called turmeric. The other major curcuminoids present in turmeric are demethoxycurcumin, bisdemethoxycurcumin, and cyclocurcumin; together, they are termed the curcuminoid complex. The turmeric plant and preparations derived from it have a long history of therapeutic application in traditional Asian medicine. The crude and often dried plant material is widely consumed as a food additive, as part of curry spices, which typically contain numerous other ingredients. Turmeric and its preparations also have a long history of use as herbal medicines and dietary supplements, primarily to treat various inflammatory disorders.

Significant confusion exists in the scientific biomedical literature, as well as the popular literature, about the meaning of curcumin. Consequently, one group has developed a classification scheme that is described below.[1]

Several companies distribute curcumin as a dietary supplement. In the United States, dietary supplements are regulated by the U.S. Food and Drug Administration (FDA) as a separate category from foods, cosmetics, and drugs. Unlike drugs, dietary supplements do not require premarket evaluation and approval by the FDA unless specific disease prevention or treatment claims are made. The quality and amount of ingredients in dietary supplements are also regulated by the FDA through Good Manufacturing Practices (GMPs). The FDA GMPs requires that every finished batch of dietary supplement meets each product specification for identity, purity, strength, composition, and limits on contamination that may adulterate dietary supplements. The FDA can remove dietary supplements from the market that are deemed unsafe. Because dietary supplements are not formally reviewed for manufacturing consistency every year, ingredients may vary considerably from lot to lot. In addition, there is no guarantee that ingredients claimed on product labels are present at all or are present in the specified amounts. The FDA has not approved the use of curcumin as a treatment for cancer or any other medical condition.

### Categories of Curcumin-type Products

The materials that have received the moniker curcumin may be divided into five categories:

i. Turmeric (T): Raw C. longa rhizomes.
ii. Turmeric extract (TE): A solvent extract of dried or fresh C. longa rhizomes.
iii. Curcuminoids-enriched turmeric extract (CTE): Typically the deep-yellow precipitate collected from the solvent extract upon concentration under reduced temperature.
iv. Curcuminoids-enriched material (CEM): Obtained by additional, often large-scale, chromatographic purification of CTE.
v. Curcumin (CUR): A single-chemical entity, in a purity that is commensurate with that of a validated and/or metrological reference material.

It is important to note that materials often referred to as curcumin are not identical to the pure, single-chemical entity. Because of the deficiency in the adequate chemical characterization of the immense diversity of crude turmeric (T), extracts (CE), enriched materials (CTE, CEM), and even materials considered pure, augmented by the fact that the materials often share the same name (curcumin), the usefulness of the biological data acquired from the plethora of these preparations is questionable.[1] Furthermore, attributing biological activity of a complex mixture solely to the major component, however prominent, is problematic.[2]

This summary refers to all turmeric-derived intervention materials by using the collective term, curcumin-containing products. Tables at the end of each section specify the exact intervention material used in each cited study.

### References

Nelson KM, Dahlin JL, Bisson J, et al.: The Essential Medicinal Chemistry of Curcumin. J Med Chem 60 (5): 1620-1637, 2017.28074653
Pauli GF, Chen SN, Friesen JB, et al.: Analysis and purification of bioactive natural products: the AnaPurNa study. J Nat Prod 75 (6): 1243-55, 2012.22620854

## Laboratory/Preclinical Studies

Extensive research over the past two decades suggests that curcuminoids belonging to the diferuloylmethane class of natural products, the major constituents in turmeric (Curcuma longa), interfere with multiple cell signaling pathways, which provides support for the potential role of curcumin in modulating carcinogenesis. These pathways include the following:[1-12]

- Cell cycle (cyclin D1 and cyclin E).
- Apoptosis (activation of caspases and down-regulation of antiapoptotic gene products).
- Proliferation (human epidermal growth factor receptor-2 [HER-2], epidermal growth factor receptor [EGFR], and activating protein-1 [AP-1]).
- Survival (phosphoinositide 3-kinase [PI3K]/protein kinase B [AKT]) invasion (matrix metallopeptidase-9 [MMP-9] and adhesion molecules).
- Angiogenesis (vascular endothelial growth factor [VEGF]).
- Metastasis (CXC-chemokine receptor-4 [CXCR-4]).
- Inflammation (nuclear factor-kappa B [NF-kappa B], tumor necrosis factor [TNF], interleukin- 1 [IL-1], interleukin-8 [IL-8], interleukin-12 [IL-12], cyclooxygenase-2 [COX-2], and 5-lipoxygenase [5-LOX]).

While these reports can possibly provide support for the potential role of curcumin-containing products in modulating carcinogenesis, definitive conclusions cannot be made, especially in light of the widespread confusion and/or misconception regarding the chemical nature of curcumin-containing products outlined above.

Because of the abundance of in vitro and preclinical studies in the past two decades, there has been a significant increase in the number of clinical trials investigating the therapeutic potential of curcumin-containing products. These clinical trials have used varying formulations and doses of curcuminoids for the prevention and treatment of cancer and to ameliorate symptoms of cancer treatment. This summary will focus on the bioavailability, safety, and effectiveness of curcumin-containing products reported in clinical trials that targeted individuals at high risk of cancer and cancer patients for the prevention and treatment of cancer and ameliorating the symptoms of cancer treatment.

### References

Alexandrow MG, Song LJ, Altiok S, et al.: Curcumin: a novel Stat3 pathway inhibitor for chemoprevention of lung cancer. Eur J Cancer Prev 21 (5): 407-12, 2012.22156994
Panahi Y, Darvishi B, Ghanei M, et al.: Molecular mechanisms of curcumins suppressing effects on tumorigenesis, angiogenesis and metastasis, focusing on NF-κB pathway. Cytokine Growth Factor Rev 28: 21-9, 2016.26774676
Cho JW, Lee KS, Kim CW: Curcumin attenuates the expression of IL-1beta, IL-6, and TNF-alpha as well as cyclin E in TNF-alpha-treated HaCaT cells; NF-kappaB and MAPKs as potential upstream targets. Int J Mol Med 19 (3): 469-74, 2007.17273796
Pal S, Bhattacharyya S, Choudhuri T, et al.: Amelioration of immune cell number depletion and potentiation of depressed detoxification system of tumor-bearing mice by curcumin. Cancer Detect Prev 29 (5): 470-8, 2005.16188398
Sehgal A, Kumar M, Jain M, et al.: Synergistic effects of piperine and curcumin in modulating benzo(a)pyrene induced redox imbalance in mice lungs. Toxicol Mech Methods 22 (1): 74-80, 2012.21859361
Dance-Barnes ST, Kock ND, Moore JE, et al.: Lung tumor promotion by curcumin. Carcinogenesis 30 (6): 1016-23, 2009.19359593
Moghaddam SJ, Barta P, Mirabolfathinejad SG, et al.: Curcumin inhibits COPD-like airway inflammation and lung cancer progression in mice. Carcinogenesis 30 (11): 1949-56, 2009.19793800
Lee JC, Kinniry PA, Arguiri E, et al.: Dietary curcumin increases antioxidant defenses in lung, ameliorates radiation-induced pulmonary fibrosis, and improves survival in mice. Radiat Res 173 (5): 590-601, 2010.20426658
Sharma RA, Euden SA, Platton SL, et al.: Phase I clinical trial of oral curcumin: biomarkers of systemic activity and compliance. Clin Cancer Res 10 (20): 6847-54, 2004.15501961
Cheng AL, Hsu CH, Lin JK, et al.: Phase I clinical trial of curcumin, a chemopreventive agent, in patients with high-risk or pre-malignant lesions. Anticancer Res 21 (4B): 2895-900, 2001 Jul-Aug.11712783
Carroll RE, Benya RV, Turgeon DK, et al.: Phase IIa clinical trial of curcumin for the prevention of colorectal neoplasia. Cancer Prev Res (Phila) 4 (3): 354-64, 2011.21372035
Aggarwal BB, Kumar A, Bharti AC: Anticancer potential of curcumin: preclinical and clinical studies. Anticancer Res 23 (1A): 363-98, 2003 Jan-Feb.12680238

## Human/Clinical Studies

### Bioavailability of Curcumin-Containing Products (Phase I Clinical Trials)

At least six phase I clinical trials of curcumin-containing products have investigated the pharmacokinetics and pharmacodynamics of pure curcumin (CUR) alone in humans. These studies have shown that systemic exposure to curcumin-containing products at doses of up to 8,000 mg/day was safe and tolerable and did not cause serious adverse events. In these studies, the peak serum concentrations ranged from 47 ng/mL (at a dose of 200 mg of oral curcumin daily) to 1,380 ng/mL (at a dose of 8,000 mg of oral curcumin daily).[1-6]

These concentrations refer to total curcumin, meaning that studies do not differentiate between free (unconjugated) curcumin and curcumin conjugated with glucuronic acid or sulfate. Conjugated curcumin is the more abundant metabolite in circulation. While studies indicate that conjugated curcumin is less bioactive than free curcumin, there are also indications for the enzymatic release of free curcumin from the conjugated forms at sites of inflammation.[7,8]

The assessment of curcuminoid bioavailability, including that of CUR, is confounded by the pronounced metabolic and (photo)chemical instability of these compounds. Because of the varying preparations, formulations, and doses of intervention materials tested in the phase I clinical trials, it is unclear which curcumin-containing products and doses of CUR and/or other constituents of Curcuma longa are required to produce a clinically significant modulation of biomarkers or even clinical outcomes. The general consensus that the plasma levels of CUR required to achieve any biological effects in patients are much higher than what has been observed clinically to date. Studies have directly compared the bioavailability of unformulated curcumin-containing preparations with CUR that is formulated for enhanced bioavailability. These studies have consistently shown an increase in plasma levels using formulated CUR; however, these levels are still relatively low and do not exceed therapeutically insufficient concentrations.[9,10]

Table 1. Curcumin-Containing Products in Phase I Clinical Trials

Source | Description of Curcuminoid-Containing Product | Supplier | Type of Product^a^
[1 ,3 ,5] | Standardized turmeric extract formulated in capsules (curcumin C3 complex); each capsule contained 450 mg of curcumin, 30 mg of demethoxycurcumin, and 20 mg of bisdemethoxycurcumin | Sabinsa Corp. (Piscataway, NJ, USA and East Windsor, NJ, USA) | TE
[2] | Theracurmin (200 mg, then escalated to 400 mg) | Theravalues Corp. (Tokyo) | CEM
[4] | P54FP formulated in soft gelatin capsules. Each capsule contained 20 mg of curcuminoids (18 mg of curcumin and 2 mg of demethoxycurcumin) suspended in 200 mg of essential oils derived from Curcuma spp. Typical constituents of Curcuma essential oils are tumerone, atlantone, and zingiberene. | Phytopharm plc. (Godmanchester, United Kingdom) | CEM
[6] | Diferuloylmethane (99.3% pure; 500 mg per tablet) | Yung-Shin Pharmaceutical Co. (Taiwan) | CUR

CEM = further processed curcuminoid-enriched materials; CUR = curcumin as a single-chemical entity; TE = turmeric extract.

^a^For a more detailed definition of these terms, see the General Information and History section.

### Cancer Prevention and Treatment of Precancerous Lesions

Investigations into products that may aid in the prevention of cancer and the treatment of precancerous lesions are important for the development of early intervention strategies and treatments. A few studies have investigated the potential clinical benefit of curcumin-containing products, and other studies are under way. See ClinicalTrials.gov.

#### Colorectal cancer

Researchers have explored curcumin’s potential in curcumin-containing products for the prevention of colon cancer through its effects on precancerous lesions.

Published results (curcumin-containing product for prevention of colon cancer):

1. One small study (N = 5) assessed patients with familial adenomatous polyposis (FAP). The patients, all of whom had previous colectomies (four patients with retained rectums and one patient with an ileal anal pouch), received 480 mg of curcumin and 20 mg of quercetin 3 times per day orally for 6 months.[11]
  - At 3 months, four of five patients had a decrease in polyp number and size from baseline.
  - At 6 months, this decrease continued for four of the patients, one patient was lost to follow-up after 3 months of treatment.
2. This same group conducted a controlled trial of 100% pure CUR (1,500 mg orally, 2 times/day) in a similar population of individuals with FAP (N = 44; placebo = 23; curcumin = 21).[12]
  - Results of this study contradicted previous findings. No significant difference was found between the two treatment arms in this study.
3. A third study that investigated oral curcumin used 2 doses (2,000 mg and 4,000 mg) of curcuminoid-containing powder (98%) given orally once daily for 30 days.[13] The study investigated the potential efficacy of curcumin-containing products in reducing the concentrations of prostaglandin E2 (PGE2) and 5-hydroxyeicosatetraenoic acid (5-HETE) (procarcinogenic factors) within aberrant crypt foci (ACF) (primary endpoint) and associated normal mucosa. The secondary endpoints included total ACF number (visible on endoscopy) and an estimate of proliferation in normal mucosa using the proliferation marker Ki-67. Forty patients were evaluable, with 20 participants in each dose group.[13]
  - There was no significant decrease in primary or secondary endpoints in either group of patients, except for a 40% decrease in the number of ACF in the group of patients who received 4,000 mg doses.
  - The ACF reduction in the 4,000 mg group was associated with a significant, five-fold increase in posttreatment plasma curcumin and conjugate levels.

#### Head and neck cancer

Treatment of patients with oral leukoplakia using a curcumin-containing product was investigated in a randomized trial.[14]

Published results (curcumin-containing product to treat oral leukoplakia):

1. In one trial, 223 patients with oral leukoplakia were randomly assigned to receive either 3,600 mg of an oral curcumin-containing product (N = 111) or a placebo (N = 112) twice daily after food for 6 months.[14] The intervention material contained a curcuminoid-enriched material (CEM) reconstituted with turmeric oil and dispensed in capsules (BCM95–Biocurcumax). Clinical response (primary endpoint) was determined by measurement of leukoplakia at baseline and at 6 months. At 6 months, 213 patients were evaluable (curcumin, N = 105; placebo, N = 108).
  - Of these patients, complete or partial responses were observed in 75 patients from the curcumin-containing product group and in 62 patients from the placebo group (a statistically significant difference).
  - One hundred three patients with a clinical response at 6 months continued the curcumin-containing product or placebo treatment to evaluate long-term treatment effects.
  - There was no statistically significant difference between treatment arms at 12 months, suggesting no additional benefits with treatment longer than 6 months.
  - Histological response (complete reversal of dysplasia/hyperplasia vs. partial reversal vs. no response vs. increased severity; secondary endpoint) between the groups was not significant, but combined histological and clinical response showed a significantly better response to the curcumin-containing product.

#### Multiple myeloma

The effect of a curcumin-containing product was investigated in patients with monoclonal gammopathy of undetermined significance (MGUS) or smoldering multiple myeloma (SMM).

Published results (effectiveness of curcumin-containing product on MGUS and SMM):

1. A double-blind, placebo-controlled, crossover study followed by an open-label extension study explored the effectiveness of a curcumin-containing product in patients with MGUS or SMM. Thirty-six patients (19 with MGUS and 17 with SMM) were randomly assigned to receive either 4,000 mg of the curcumin-containing product (curcumin stick-pack contained 3,600 mg of curcumin, 320 mg of demethoxycurcumin, and 80 mg of bisdemethoxycurcumin; one-half in the morning and one-half in the evening as a divided dose) or 4,000 mg of placebo, crossing over at 3 months. At completion of the first study, patients were given the option to begin the open-label 8,000 mg dose-extension study. Twenty-five patients (9 with SMM and 16 with MGUS) completed the crossover study and 18 patients (7 with SMM and 11 with MGUS) completed the extension study.[15]
  - Serum analysis revealed decreases in free light-chain ratio (rFLC); a difference between clonal and nonclonal light-chain (dFLC) and involved free light-chain (iFLC) was observed but not statistically significant in the group of patients who received the curcumin-containing product in the crossover study.
  - In the group of patients who received the placebo and then crossed over to receive the curcumin-containing product, no significant changes occurred after crossover. Urinary deoxypyridinoline (uDPYD), a marker of bone resorption, decreased in the curcumin-containing product arm and increased in the placebo arm.
  - Significant decrease in rFLC and uDPYD occurred in the open-label study.

#### Hepatoma (liver cancer)

The efficacy and safety of curcumin-containing products have been studied in patients with nonalcoholic fatty liver disease (NAFLD).

Published results (effectiveness of curcumin-containing product on NAFLD):

1. A study evaluated the efficacy and safety of supplementation with a phytosomal curcumin-containing product in patients with NAFLD (grades 1–3 according to liver ultrasonography) These patients were randomly assigned to receive either the curcumin-containing product (phytosomal form; 1,000 mg/day in 2 divided doses; N = 50) or the placebo (N = 52) for a period of 8 weeks.[16]
  - Results indicated that supplementation with the curcumin-containing product was associated with a reduction in body mass index (-0.99 ± 1.25 in the curcumin-containing product group vs. -0.15 ± 1.31 in the placebo group; P = .003) and waist circumference (1.74 ± 2.58 in the curcumin-containing product group vs. -0.23 ± 3.49 in the placebo group; P = .024).
  - Ultrasonographic findings were improved in 75.0% of patients in the curcumin-containing product group, while the rate of improvement in the control group was 4.7% (P < .001).
  - Serum levels of aspartate aminotransferase (AST) and alanine aminotransferase (ALT) were reduced by the end of the trial in the patients in the curcumin-containing product group (P < .001) but elevated in the patients in the control group (P < .001).
  - The curcumin-containing product was safe and well-tolerated during the trial.
2. A 2019 meta-analysis analyzed four randomized controlled trials that included 228 patients.[17]
  - Results indicated a trend toward significant reduction of ALT blood concentrations in a subgroup of patients who received ≥1,000 mg/day curcumin-containing product supplementation (-11.36 IU/L; 95% confidence interval [CI], -22.75–0.02; I^2^: 51%).
  - The meta-analysis showed a significant reduction of AST levels in patients who received curcumin-containing products in studies with 8 weeks of administration (-9.22 IU/L; 95% CI, -12.77 to -5.67; I^2^: 49%).
  Based on these findings, the authors suggested that curcumin-containing products, at higher dosages, might have a favorable effect on patients with NAFLD.[17]

Table 2. Curcumin-Containing Products in Cancer Prevention and Treatment of Precancerous Lesions Trials

Source | Description of Curcuminoid-Containing Product | Supplier | Type of Product^a^
[11] | Curcumin-containing product (480 mg) and quercetin (20 mg) using Oxy-Q tablets | Farr Laboratories (Santa Clarita, CA, USA) | CEM
[12] | 100% pure curcumin (CUR) | No source given | CUR
[13] | Pure curcumin (CUR) powder; 98.0% by HPLC | Sabinsa Corp. (East Windsor, NJ, USA) | TE
[14] | Curcumin-containing product, reconstituted with turmeric oil and dispensed in capsules (BCM95–Biocurcumax) | Arjuna Natural Extracts Ltd. (Kerela, India) | CEM
[15] | C3 curcuminoid granule stick-packs (Allepey finger turmeric); each curcumin-containing product stick-pack contained 4,000 mg of curcuminoids (3,600 mg of curcumin [CUR], 320 mg of demethoxycurcumin, and 80 mg of bisdemethoxycurcumin) | Sabinsa Corp. (Piscataway, NJ, USA) | TE
[16] | A phytosomal formulation that contained a complex of curcuminoids and soy phosphatidylcholine in a 1:2 weight ratio, and 2 parts of microcrystalline cellulose, with an overall content of curcumin in the final product of around 20% | Meriva; Indena S.p.A, (Milan, Italy) | CEM

CEM = further processed curcuminoid-enriched materials; CUR = curcumin as a single-chemical entity; HPLC = high-performance liquid chromatography; TE = turmeric extract.

^a^For a more detailed definition of these terms, see the General Information and History section.

### Cancer Treatment

#### Biomarker studies

Biomarkers have long been used to identify and understand the etiology of various diseases. In cancer research, there are different types of cancer biomarkers. Prognostic biomarkers determine the likely outcome of the disease and if further treatment is warranted and predictive biomarkers ascertain the likelihood the disease will respond to treatment.[18]

Five clinical studies have been performed to evaluate the effects of supplementation with curcumin-containing products on predictive biomarkers in patients with different types of cancer. Various biomarkers from these studies were evaluated as potential efficacy measures to ascertain the usefulness of curcumin-containing products alone and as an adjunctive therapy. Different curcumin-containing products were used. Curcuminoid doses used in these studies ranged from 20 mg/day to 3,000 mg/day. One of the studies did not identify the amount of curcuminoids administered, but used 5 g of turmeric powder dissolved in 150 mL of milk 3 times/day.[19]

The main biomarkers used in these studies were serum levels of the following:

- Total antioxidant capacity (TAC).[20]
- Superoxide dismutase (SOD).[20]
- Glutathione peroxidase (GPx).[20]
- Tumor necrosis factor-alpha (TNF-alpha).[21,22]
- Transforming growth factor-beta (TGF-beta).[22]
- Interleukin-6 (IL-6).[22]
- Cyclooxygenase-2 (COX-2).[23]
- Prostaglandin E2 (PGE2).[23]
- Nitric oxide.[19]
- Histological expression of p53 on cancer cells.[21]

Results from four of the studies indicated an association between a positive change in a biomarker and patient outcome as follows:

- TAC increased and SOD decreased.[20]
- p53 expression increased and TNF-alpha decreased.[21 ,22]
- TGF-beta and IL-6 decreased.[22]
- Reduction in nitric oxide.[19]

However, another study found no statistically significant difference between comparison groups when accounting for the observed biomarker, PGE2.[23] Additionally, a different study found no significant change in GPx.[20]

Another study conducted using a proprietary lecithin delivery system of a curcumin-containing product (500 mg tablet) given 3 times/day found that curcumin-containing product supplementation consistently improved oxidative status in patients who received chemotherapy and radiation therapy.[24]

#### Curcumin-containing products alone

Two studies have been published that suggest a possible antitumor effect of curcumin-containing products.

Published results (possible antitumor effect of curcumin-containing product):

1. One report described a patient with treatment-resistant myeloma who began a daily oral regime of a curcumin-containing product. A single 8,000 mg dose of the curcumin-containing product (containing curcuminoids complexed with bioperine to aid with absorption) was taken on an empty stomach each evening. The patient also underwent hyperbaric oxygen treatment.[25]
  - Over the course of 60 months, the patient’s cancer remained stable with minor fluctuations in paraprotein levels.
2. An open-label phase II trial investigated the efficacy and toxicity of curcumin-containing products alone in patients with advanced pancreatic cancer.[26] The study enrolled 25 patients who received 8,000 mg (orally) of a curcuminoid-containing product daily until disease progression; each 1 g capsule contained 900 mg of curcumin, 80 mg of demethoxycurcumin, and 20 mg of bisdemethoxycurcumin. Of the 25 patients, 21 were evaluable for response and 24 for toxicity.
  - No treatment-related toxicity was reported.
  - One patient had stable disease for more than18 months and another patient had a brief tumor regression.

#### Imatinib and curcumin-containing products

Imatinib and curcumin-containing products have been studied in patients with metastatic adenoid cystic carcinoma (ACC).

Published results (treatment of c-kit–positive metastatic ACC with imatinib and a curcumin-containing product):

1. A published case report described the successful treatment of a patient with a c-kit–positive metastatic ACC using imatinib and a curcumin-containing product. Imatinib was administered orally at 400 mg/day along with 225 mg/m^2^ of a curcumin-containing product in 1,000 mL of normal saline intravenously (IV) over 2 to 3 hours, twice a week. An oral curcumin-containing product was also administered, two capsules twice daily (42 mg curcumin per capsule). This regimen was continued for 6 months.[27]
  - Stable disease was observed after 2 months of treatment, and a significant reduction in tumor mass (80% decrease in tumor volume in lungs) was observed at 6 months.
  - After cessation of IV treatment at 6 months, but with steady use of an oral curcumin-containing product and imatinib, the patient showed continuous clinical and radiographic improvements.
  Given the known activity of imatinib against c-kit–positive tumors, the contribution of curcumin-containing products to the efficacy of this patient’s treatment regimen is unclear.

#### Docetaxel and curcumin-containing products

Two studies have explored the efficacy, tolerability, and feasibility of docetaxel plus curcumin-containing products in the treatment of cancer.[28,29]

Published results (efficacy of docetaxel and a curcumin-containing product):

1. The first study, published in 2010 and conducted in France, examined docetaxel plus curcumin-containing products in patients with advanced and metastatic breast cancer.[28] Six dose levels of oral curcumin-containing products were studied. Doses varied from 500 mg to 8,000 mg daily along with docetaxel (100 mg/m^2^) administered as a 1-hour IV infusion on day 1 of each 3-week cycle for six cycles. Fourteen patients were enrolled in the study, and ten patients completed the treatments of docetaxel plus a curcumin-containing product. Diarrhea and headaches were the main dose-limiting toxicities, and three patients considered the amount of the curcumin-containing product (16 capsules a day) as unacceptable. A curcumin-containing product dose of 6,000 mg/day for 7 consecutive days every 3 weeks was determined to be the recommended dose for further investigation in combination with a standard dose of docetaxel.[28]
  - Among the evaluable patients enrolled on the study, no disease progression was observed with the combination treatment.
  - One patient had evaluable bone lesions that were stable after six cycles of treatment.
  - Five patients had partial responses, and three patients had stable disease.
  - A biological response was documented with a decrease of tumor markers in seven patients.
2. A randomized phase II study compared docetaxel and curcumin with docetaxel and placebo in patients with metastatic castration-resistant prostate cancer.[29] Patients received 75 mg/m^2^ of docetaxel on day 1 every 3 weeks for six cycles and 5 mg of prednisone or prednisolone twice a day. Patients also received either 6 g of curcumin or placebo daily (4 capsules, 500 mg each, 3 times per day: morning, lunchtime, and evening) for 7 consecutive days every 3 weeks.
  - There were no differences in progression-free survival (PFS), prostate-specific antigen response rate, overall survival (OS), or quality of life between the groups.

A multicenter, phase II, randomized, double-blind study was initiated at the same institution in France and compared docetaxel plus a curcumin-containing product with docetaxel plus placebo in the first-line treatment of patients with metastatic castration-resistant prostate cancer. The study was terminated for futility in view of results from the interim analysis (NCT02095717 (https://www.cancer.gov/clinicaltrials/NCT02095717)).

#### Gemcitabine and curcumin-containing products

Three studies investigated the efficacy and safety of variable formulations and doses of curcumin-containing products in combination with gemcitabine. All studies administered gemcitabine 1,000 mg/m^2^ IV weekly for 3 of 4 weeks, but differed in rate of gemcitabine administration.

Two research studies of first-line treatment in patients with advanced and metastatic pancreatic cancer (PC) showed differing results in tolerability and toxicity profiles.

Published results (gemcitabine and a curcumin-containing product):

1. A research group from Israel enrolled 17 patients in an open-label, phase II trial.[30] Patients received 8,000 mg of a curcumin-containing product by mouth daily concurrently with chemotherapy.
  - Five patients discontinued the curcumin component of the combined treatment mostly because of gastrointestinal toxicity, and 11 evaluable patients received the planned concurrent treatment of the two drugs until progression of disease (median, 2.5 months); one patient died at home from causes unrelated to the study.
  - Seven patients reported gastrointestinal toxicity, mostly diarrhea.
  - Of the 11 evaluable patients, 1 had a partial response, 4 had stable disease, and 6 had tumor progression.
  - Median overall survival was 5 months.
  The authors concluded that this combination of curcumin-containing products and gemcitabine is not feasible in this population of patients.
2. Conversely, an Italian study (N = 44) reported good tolerability using 2,000 mg daily of a curcumin-containing product.[31]
  - A partial response was observed in 27.3% of patients and stable disease was observed in 34.1% of patients; the overall disease control rate was 61.4%.
  - The median OS was 10.2 months and median time to progression was 8.4 months, which is reported to be higher than the historically observed OS rates of 5.7 to 6.7 months for gemcitabine as a single agent.
  - The researchers also noted that patients using this combination of a curcumin-containing product and gemcitabine reported lower-than-expected hematological toxicity. Grade 3 to grade 4 diarrhea occurred in only one patient.
3. A clinical trial of patients with gemcitabine-resistant PC also found this combination to be safe and effective (N = 21). In addition to gemcitabine, this study administered 60 mg/m^2^ of S-1 orally for 14 consecutive days every 3 weeks.[32] Patients received a mixture of curcuminoids (8,000 mg/day) that they took at their own convenience, while on a standard chemotherapy treatment schedule; the compliance rate was 90%.
  - No patients experienced a partial or complete response.
  - Five patients demonstrated stable disease.
  - The most common adverse events of fatigue, anorexia, and diarrhea were attributed to chemotherapy or disease progression.

#### FOLFOX and curcumin-containing products

A group from the United Kingdom conducted a combined phase I dose-escalation study and a phase IIA study of oral daily curcumin-containing products with folinic acid, fluorouracil, and oxaliplatin (FOLFOX) (CUFOX) in patients with metastatic colorectal cancer to assess safety, tolerability, and a suitable dose of curcumin.[33,34] Both studies used the same curcumin-containing product.

Published results (FOLFOX and a curcumin-containing product):

1. In the phase I dose-escalation trial, oral doses of 500 mg, 1,000 mg, or 2,000 mg of curcumin-containing products were given daily with a loading period of 1 week before initiation of FOLFOX chemotherapy.[33]
  - The curcumin-containing product was determined to be a safe and well-tolerated adjuvant therapy to FOLFOX at doses up to 2,000 mg/day.
  - Of the 12 patients, 11 patients demonstrated stable disease or partial responses to the treatment after six cycles and 8 patients maintained these responses.
  - Median PFS was 34 weeks.
  - The adverse events (AEs) reported were primarily gastrointestinal, mainly diarrhea, which is consistent with those described with FOLFOX alone and in some curcumin-containing product trials.
2. In the phase IIA study, 28 patients were accrued, 18 of whom received CUFOX with or without bevacizumab, while 9 patients were randomly assigned to the control arm and received FOLFOX with or without bevacizumab. One patient was deemed ineligible and was excluded from analyses.[34]
  - Grade 1 or grade 2 fatigue, peripheral neuropathy, and diarrhea were the most reported AEs in both arms.
  - Three patients who received CUFOX reported grade 3 or grade 4 thromboembolic events.
  - No complete response was observed; however, 22% of patients who received FOLFOX exhibited stable disease and 44% of patients who received FOLFOX exhibited partial responses; 28% of patients who received CUFOX exhibited stable disease and 56% of patients who received CUFOX exhibited partial responses.
  - The median PFS was 171 days for patients who received FOLFOX and 320 days for patients who received CUFOX.
  - The median OS was 200 days for patients who received FOLFOX and 596 days for patients who received CUFOX.
  - The difference in median OS rates between the two arms in this study was statistically significant. However, the small sample size and an imbalance between the two groups regarding the percentage of patients with two or more metastatic sites makes this result difficult to interpret.

Table 3. Clinical Trials of Curcumin-Containing Products for Cancer Treatment

Reference | Trial Design | Condition or Cancer Type | Type of Chemotherapy | Treatment Groups | Results | Level of Evidence Score^a^
[26] | Phase II, open-label trial | Advanced pancreatic cancer | N/A | N = 25 patients enrolled; 24 were evaluable for toxicity and 21 were evaluable for response | No treatment-related toxicities were observed; one patient remained stable for >18 months and another patient had a dramatic but brief tumor response | 2Dii
[28] | Phase I, dose-escalation trial | Advanced and metastatic breast cancer | Docetaxel | N = 14 | 3 dose-limiting toxicities were observed and 2 of 3 patients at these dose levels refused to continue treatment | 2C
[29] | Randomized, phase II | Castration-resistant prostate cancer | Docetaxel | N = 50; 24 patients received placebo and docetaxel and 26 patients received docetaxel and curcumin | No difference between groups was reported | 1iDii
[30] | Phase II, open-label trial | Locally advanced and metastatic pancreatic cancer | Gemcitabine | N = 17; 4 locally advanced and 11 metastatic | Median time to tumor progression was 2.5 mo | 2Diii
[31] | Phase II trial | Locally advanced and metastatic pancreatic cancer | Gemcitabine | N = 44; 13 locally advanced and 34 metastatic | Partial response in 27.3% of patients and stable disease in 34.1% of patients | 2Diii
[32] | Phase I/II trial | Gemcitabine-resistant pancreatic cancer | Gemcitabine | N = 21; 19 patients received combination therapy and 2 patients received gemcitabine monotherapy | Phase I study outcome showed safety of oral curcumin-containing product. Additionally, no patients withdrew from this study because of curcumin-containing product intolerability, thus meeting the primary endpoint of the phase II study | 2C
[33] | Phase I, dose-escalation trial | CRLM | FOLFOX | N = 12 | This study revealed curcumin-containing products to be safe and tolerable adjuncts to FOLFOX chemotherapy in patients with CRLM at doses up to 2 g/d | 2C
[34] | Phase IIA trial | Colorectal cancer with inoperable liver metastases | FOLFOX | N = 28; 9 received FOLFOX alone and 18 received FOLFOX + a curcumin-containing product | Daily oral curcumin-containing product combined with FOLFOX chemotherapy was safe and tolerable | 2C

CRLM = colorectal liver metastases; FOLFOX = folinic acid, fluorouracil, and oxaliplatin; PSA = prostate-specific antigen.

^a^For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

Table 4. Curcumin-Containing Products in Cancer Treatment Trials

Source | Description of Curcuminoid-Containing Product | Supplier | Type of Product^a^
[19] | Turmeric powder dissolved in 150 mL of milk | No source given | T
[20] | Curcumin-containing product capsules (BCM-95 CURCUGREEN) | Arjuna Natural Extracts Ltd. (Kerela, India) | TE
[21] | Curcumin-containing product (not further described) | Sigma Aldrich (Shanghai, China) | CUR
[22 ,31] | Phytosomal preparation of curcuminoids | Meriva; Indena S.p.A (Milan, Italy) | CEM
[23] | P54FP, an extract of Curcuma spp.; a liquid in 220 mg capsules (9% curcumin [CUR] and 1% demethoxycurcumin with the remainder constituted by essential oils derived from Curcuma domestica and Curcuma xanthorrhiza) | Sigma Chemical Co. (Poole, United Kingdom); Phytopharm plc (Godmanchester, United Kingdom) | CEM
[24] | Meriva (ratio of curcumin: demethoxycurcumin: bis-demethoxycurcumin, 33:8:1), 200 mg soy lecithin, and 200 mg microcrystalline cellulose | Meriva; Indena S.p.A (Milan, Italy) | CEM
[25] | Curcumin-containing product complexed with bioperine | Patient administered, not prescribed by a physician; no source given | CEM
[35] | Curcumin-containing product (not specified) | No source given | CUR
[26] | A preparation containing CUR (87.2%); demethoxycurcumin (10.5%); and bisdemethoxycurcumin (2.3%) | Sabinsa Corp. (Piscataway, NJ, USA) | TE
[27] | A proprietary formulation containing 42 mg of CUR in a form that enhances the solubility of CUR in water | Arantal | CTE
[28] | Curcuma extract (not specified) | No source given | TE
[29] | Each capsule contained 500 mg of CUR | No source given | CUR
[30] | Each capsule contained 500 mg of curcuminoids (curcumin [CUR] 450 mg, demethoxycurcumin 40 mg, and bisdemethoxycurcumin 10 mg) | Sabinsa Corp. (Piscataway, NJ, USA) | TE
[32 -34] | Curcumin-containing product in microbead form, containing a mixture of curcuminoids (Curcumin C3 Complex) that contains curcumin (CUR; 73%), demethoxycurcumin (22%), and bisdemethoxycurcumin (4%) | Sabinsa Corp. (Piscataway, NJ, USA) | TE

CEM = further processed curcuminoid-enriched materials; CTE = curcuminoid-enriched turmeric extract; CUR = curcumin as a single-chemical entity; T = Turmeric; TE = a hybrid of a CEM and Turmeric essential oil.

^a^For a more detailed definition of these terms, see the General Information and History section.

### Quality-of-Life Studies

One study examined the potential effect of curcumin on the quality of life (QOL) of cancer patients (N = 80) with solid tumors, predominantly gastric, colorectal, and breast cancer.[22] All patients received standard treatment for their respective cancers while enrolled in the study. Patients were randomly assigned to receive either curcuminoids (180 mg/day) or matched placebo for 8 weeks. Curcuminoids were prepared with phosphatidylcholine to boost bioavailability. Meriva contains 20% curcuminoids; therefore, each patient was asked to take three 300 mg capsules per day (one capsule tid).

This study reported an overall increase in self-reported QOL in both groups, with greater improvement in the curcuminoid group. However, because of the higher baseline QOL values in the placebo group when compared with the curcuminoid group, it is difficult to interpret these results.

Table 5. Curcumin-Containing Products in Quality-of-Life Studies

Source | Description of Curcuminoid-Containing Product | Supplier | Type of Product^a^
[22] | Phytosomal preparation of curcuminoids | Meriva; Indena S.p.A, (Milan, Italy) | CEM

CEM = further processed curcuminoid-enriched materials.

^a^For a more detailed definition of these terms, see the General Information and History section.

### Cancer Therapy Side Effects

#### Dermatitis

The effects of curcumin-containing products on radiation-induced dermatitis were investigated in three studies.[36-38] Two of the studies evaluated oral curcumin-containing products while one study assessed topical application of a curcumin-containing cream.

Published results (curcumin-containing products in the treatment of radiation-induced dermatitis):

1. In a randomized, double-blind, placebo-controlled study, 30 adult women with breast cancer who received radiation therapy alone were randomly assigned to receive either experimental treatment (oral curcumin-containing product; 2,000 mg) or control treatment (placebo) 3 times a day.[36]
  - Self-reported pain measures showed no significant differences between the treatment arms. However, the severity of radiation dermatitis at the treatment site was reduced in patients who received the oral curcumin-containing product.
2. A multi-site, randomized, double-blind, placebo-controlled study assessed the efficacy of an oral curcumin-containing product to reduce radiation dermatitis severity. Breast cancer patients (N = 686) were randomly assigned to received an oral curcumin-containing product (2,000 mg) or placebo 3 times a day.[37]
  - While curcumin did not reduce radiation dermatitis severity, fewer curcumin-treated patients with a Radiation Dermatitis Severity scale score of >3.0 suggested a trend towards reduced severity; the outcome lacked statistical significance.
3. In a prospective, investigator-blinded study, 40 adult breast cancer patients underwent radiation therapy and received either a turmeric-containing cream or baby oil (placebo) for 5 weeks. The skin was treated with 5 g of turmeric-containing cream or baby oil 5 times daily, before and after radiation therapy.[38]
  - Results showed that curcumin was effective in reducing the severity of dermatitis at 2, 3, and 4 weeks, compared with placebo.

#### Mucositis

Several studies evaluated the tolerability and efficacy of a curcuminoid-containing product by oral application (mouthwash) in the treatment of oral mucositis.[39,40] The studies used several objective outcome measures, including the World Health Organization's mucositis scale and Oral Mucositis Assessment Scale.

Published results (curcuminoid-containing products in the treatment of oral mucositis):

1. A study of adult patients who received chemotherapy and radiation therapy aimed to assess the efficacy of turmeric powder with honey on treating oral mucositis. The experimental group of patients (n = 30) were given a mixture of turmeric powder and honey to apply 5 minutes before treatment, maintain during treatment, and then reapplied 5 minutes after treatment. The control group of patients received no supplementation (n = 30).[40]
  - Good tolerability and a reduction in oral mucositis were noted in patients using the turmeric and honey treatment.
  - No adverse effects were observed.
2. In an investigator-blinded, randomized, controlled trial, 80 patients with head and neck cancer underwent combined carboplatin/radiation therapy and received turmeric (6 times a day) or povidone-iodine (twice a day) mouthwash every other day. Oral mucositis was assessed using the Radiation Therapy Oncology Group (RTOG) grading system.[41]
  - Turmeric mouthwash delayed and reduced the levels of radiation-induced oral mucositis at all time points.
  - Patients who used the turmeric mouthwash had decreased intolerable mucositis, fewer treatment breaks during the first 4 weeks of treatment, and reduced weight loss.
3. In a double-blind randomized study, 32 adult patients with head and neck cancer received radiation therapy and either an oral nano-encapsulated curcumin-containing product (80 mg a day) or a placebo. Fifteen patients received the nano-encapsulated curcumin-containing product (study group), and 14 patients received the placebo (control group). Oral mucositis was assessed by the National Cancer Institute Common Toxicity Criteria.[42]
  - In the study group of patients, onset of oral mucositis was delayed.
  - Severity of mucositis increased in all patients, but the grade was significantly lower in patients receiving curcumin.
  - While 50% of patients in the control group (7 of 14) developed grade 4 mucositis, no patients developed grade 4 mucositis in the study group.
  - The study group had reduced weight loss, and no side effects were detectable in this group.
4. In a randomized single-blind study, 61 adult patients with head and neck cancer who underwent radiation therapy received either an oral curcumin-containing product (500 mg capsule; total dose of 1.5 g a day) or a placebo 3 times a day. Patients were assessed weekly during radiation therapy and 2 months after treatment.[43]
  - Beginning with week 3 of treatment, patients who received curcumin had decreased incidence and severity of oral mucositis. Two months after treatment, these patients experienced less severe oral mucositis.
  - Results from the subjective assessment of patients were comparable to those obtained using the objective scale.
  - No systemic toxicity was observed.

#### Multiple effects

A proprietary lecithin delivery system of a curcuminoid-containing product given 3 times/day (500 mg tablet) was evaluated in a controlled study to assess its efficacy in alleviating the side effects of chemotherapy and radiation therapy in patients undergoing these treatments 1 month after surgery for their cancer (N = 160; 80 patients each in the chemotherapy group and the radiation therapy group). These groups were further divided into experimental and control groups, with 40 patients in each subgroup receiving Meriva or a comparable placebo tablet. In both the chemotherapy and radiation therapy groups, frequency and severity of reported symptoms were significantly lower in the Meriva group and no significant changes were reported in the control group.[24]

Table 6. Clinical Trials of Curcumin-Containing Products for Cancer Therapy Side Effects

Reference | Trial Design | Condition or Cancer Type | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control) | Results | Level of Evidence Score^a^
[36] | RCT | Radiation dermatitis in breast cancer patients | 35; 17; 18 | Reduced severity of radiation dermatitis | 1iC
[37] | RCT | Radiation dermatitis in breast cancer patients | 695; 344; 342 | No difference in severity between the groups | 1iC
[38] | RCT | Radiation dermatitis in breast cancer patients | 40; 20; 20 | Reduced radiation dermatitis | 1iC
[40] | Nonrandomized trial | Oral mucositis | 60; 30; 30 | Reduced oral mucositis | 2C
[41] | RCT | Oral mucositis | 80; 40; 40 | Reduced oral mucositis | 1iiC
[42] | RCT | Oral mucositis | 32; 15; 14 | Reduced oral mucositis | 1iC
[43] | RCT | Oral mucositis | 64; 30; 31 | Reduced oral mucositis | 1iiC

RCT = randomized controlled trial.

^a^For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

Table 7. Curcumin-Containing Products in Symptom Management Trials

Source | Description of Curcuminoid-Containing Product | Supplier | Type of Product^a^
[36 ,37] | Curcumin C3 complex, 500 mg/capsule | Sabinsa Corp. (UT, USA) | TE
[39] | Curcumall, a liquid formula mouthwash containing a tincture of curcumin (C3 complex), turmeric, and ginger dissolved in glycerin and 0.4% of alcohol | Tumron health products (Jerusalem, Israel); Sabinsa Corp. (UT, USA) | CEM
[40] | Mixture of turmeric powder and honey | Made by researchers | T
[24] | Meriva (ratio of curcumin: demethoxycurcumin: bis-demethoxycurcumin 33:8:1), 200 mg soy lecithin and 200 mg microcrystalline cellulose | Meriva; Indena S.p.A (Milan, Italy) | CEM
[38] | Turmeric extract (16% w/w) and sandalwood oil (0.5% w/w) in a non-greasy base | Vicco Laboratories, (Maharashtra, India) | TE
[41] | Turmeric powder, 400 mg suspended in 80 mL water (use of 10 mL for mouthwash) | Himalaya Drug Company (Bangalore, India) | T
[42] | SinaCurcumin (nanocurcumin) | Nanotechnology Research Center of Mashhad University of Medical Science (Iran) | Undefined
[43] | Turmeric extract capsules (BCM-95/Curcugreen) containing essential oils of turmeric | Arjuna Natural, Aluva (India) | TE

CEM = further processed curcuminoid-enriched materials; T = Turmeric; TE = turmeric extract; w/w = weight per weight.

^a^For a more detailed definition of these terms, see the General Information and History section.

### Pediatric Population and Curcumin-Containing Products

#### Anticancer effects

A case report has been published that suggests a possible antitumor effect of a curcumin-containing product. The case report described a 6 month-old infant with infantile hemangioendothelioma. The curcuminoid-containing product was given at a dose of 400 mg/day over the course of 9 months.[35]

- Radiographic improvement was seen within 3 months.
- There was a notable decrease in liver size at 6 months, and an ultrasound showed no residual lesions within 1 year.
- The patient was well and thriving with no evidence of disease at the age of 6 years.

Given that this disease is known to frequently undergo spontaneous involution, the therapeutic activity of the curcumin-containing product in this case should be questioned. However, the authors indicated that this patient’s tumor had some signs of an adverse prognosis.

#### Mucositis

One pediatric study evaluated the tolerability and efficacy of a curcuminoid-containing product by oral application (mouthwash) in the treatment of oral mucositis.[39] The study used several objective outcome measures, including the WHO's mucositis scale and Oral Mucositis Assessment Scale. Seven patients (four evaluable) used 10 drops of Curcumall in 50 mL of water along with standard oral care (0.2% chlorohexidine mouthwash for 30 seconds) 2 times a day during doxorubicin-containing chemotherapy treatment. Curcumall is a liquid formula mouthwash containing a tincture of curcumin C3 complex, turmeric, and ginger dissolved in glycerin and 0.4% of alcohol to create a serving dose. Compliance was inconsistent as follows:[39]

- Good tolerability and a reduction in oral mucositis were noted in patients using the curcumin/turmeric mouthwash.
- Except for one patient with gastrointestinal upset, no adverse effects were observed.

Table 8. Clinical Studies of Curcumin-Containing Products for Pediatric Population

Reference | Trial Design | Condition or Cancer Type | Treatment Groups (Enrolled; Treated; Placebo or No Treatment Control) | Results | Level of Evidence Score^a^
[35] | Case report | Infantile hemangioendothelioma | 1; none; none | A decrease in liver size at 6 months, and an ultrasound showed no residual lesions within 1 year | N/A
[39] | Case series | Oral mucositis in pediatric patients | 7; 4; none | Reduced oral mucositis | 3iC

N/A = not applicable.

^a^For information about levels of evidence analysis and scores, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

### References

Garcea G, Berry DP, Jones DJ, et al.: Consumption of the putative chemopreventive agent curcumin by cancer patients: assessment of curcumin levels in the colorectum and their pharmacodynamic consequences. Cancer Epidemiol Biomarkers Prev 14 (1): 120-5, 2005.15668484
Kanai M, Otsuka Y, Otsuka K, et al.: A phase I study investigating the safety and pharmacokinetics of highly bioavailable curcumin (Theracurmin) in cancer patients. Cancer Chemother Pharmacol 71 (6): 1521-30, 2013.23543271
Irving GR, Howells LM, Sale S, et al.: Prolonged biologically active colonic tissue levels of curcumin achieved after oral administration--a clinical pilot study including assessment of patient acceptability. Cancer Prev Res (Phila) 6 (2): 119-28, 2013.23233733
Sharma RA, McLelland HR, Hill KA, et al.: Pharmacodynamic and pharmacokinetic study of oral Curcuma extract in patients with colorectal cancer. Clin Cancer Res 7 (7): 1894-900, 2001.11448902
Sharma RA, Euden SA, Platton SL, et al.: Phase I clinical trial of oral curcumin: biomarkers of systemic activity and compliance. Clin Cancer Res 10 (20): 6847-54, 2004.15501961
Cheng AL, Hsu CH, Lin JK, et al.: Phase I clinical trial of curcumin, a chemopreventive agent, in patients with high-risk or pre-malignant lesions. Anticancer Res 21 (4B): 2895-900, 2001 Jul-Aug.11712783
Kunihiro AG, Brickey JA, Frye JB, et al.: Curcumin, but not curcumin-glucuronide, inhibits Smad signaling in TGFβ-dependent bone metastatic breast cancer cells and is enriched in bone compared to other tissues. J Nutr Biochem 63: 150-156, 2019.30393127
Kunihiro AG, Luis PB, Brickey JA, et al.: Beta-Glucuronidase Catalyzes Deconjugation and Activation of Curcumin-Glucuronide in Bone. J Nat Prod 82 (3): 500-509, 2019.30794412
Schiborr C, Kocher A, Behnam D, et al.: The oral bioavailability of curcumin from micronized powder and liquid micelles is significantly increased in healthy humans and differs between sexes. Mol Nutr Food Res 58 (3): 516-27, 2014.24402825
Stohs SJ, Ji J, Bucci LR, et al.: A Comparative Pharmacokinetic Assessment of a Novel Highly Bioavailable Curcumin Formulation with 95% Curcumin: A Randomized, Double-Blind, Crossover Study. J Am Coll Nutr 37 (1): 51-59, 2018.29043927
Cruz-Correa M, Shoskes DA, Sanchez P, et al.: Combination treatment with curcumin and quercetin of adenomas in familial adenomatous polyposis. Clin Gastroenterol Hepatol 4 (8): 1035-8, 2006.16757216
Cruz-Correa M, Hylind LM, Marrero JH, et al.: Efficacy and Safety of Curcumin in Treatment of Intestinal Adenomas in Patients With Familial Adenomatous Polyposis. Gastroenterology 155 (3): 668-673, 2018.29802852
Carroll RE, Benya RV, Turgeon DK, et al.: Phase IIa clinical trial of curcumin for the prevention of colorectal neoplasia. Cancer Prev Res (Phila) 4 (3): 354-64, 2011.21372035
Kuriakose MA, Ramdas K, Dey B, et al.: A Randomized Double-Blind Placebo-Controlled Phase IIB Trial of Curcumin in Oral Leukoplakia. Cancer Prev Res (Phila) 9 (8): 683-91, 2016.27267893
Golombick T, Diamond TH, Manoharan A, et al.: Monoclonal gammopathy of undetermined significance, smoldering multiple myeloma, and curcumin: a randomized, double-blind placebo-controlled cross-over 4g study and an open-label 8g extension study. Am J Hematol 87 (5): 455-60, 2012.22473809
Panahi Y, Kianpour P, Mohtashami R, et al.: Efficacy and Safety of Phytosomal Curcumin in Non-Alcoholic Fatty Liver Disease: A Randomized Controlled Trial. Drug Res (Stuttg) 67 (4): 244-251, 2017.28158893
Mansour-Ghanaei F, Pourmasoumi M, Hadi A, et al.: Efficacy of curcumin/turmeric on liver enzymes in patients with non-alcoholic fatty liver disease: A systematic review of randomized controlled trials. Integr Med Res 8 (1): 57-61, 2019.30949432
La Thangue NB, Kerr DJ: Predictive biomarkers: a paradigm shift towards personalized cancer medicine. Nat Rev Clin Oncol 8 (10): 587-96, 2011.21862978
Ghalaut VS, Sangwan L, Dahiya K, et al.: Effect of imatinib therapy with and without turmeric powder on nitric oxide levels in chronic myeloid leukemia. J Oncol Pharm Pract 18 (2): 186-90, 2012.21844132
Hejazi J, Rastmanesh R, Taleban FA, et al.: Effect of Curcumin Supplementation During Radiotherapy on Oxidative Status of Patients with Prostate Cancer: A Double Blinded, Randomized, Placebo-Controlled Study. Nutr Cancer 68 (1): 77-85, 2016.26771294
He ZY, Shi CB, Wen H, et al.: Upregulation of p53 expression in patients with colorectal cancer by administration of curcumin. Cancer Invest 29 (3): 208-13, 2011.21314329
Panahi Y, Saadat A, Beiraghdar F, et al.: Adjuvant therapy with bioavailability-boosted curcuminoids suppresses systemic inflammation and improves quality of life in patients with solid tumors: a randomized double-blind placebo-controlled trial. Phytother Res 28 (10): 1461-7, 2014.24648302
Plummer SM, Hill KA, Festing MF, et al.: Clinical development of leukocyte cyclooxygenase 2 activity as a systemic biomarker for cancer chemopreventive agents. Cancer Epidemiol Biomarkers Prev 10 (12): 1295-9, 2001.11751448
Belcaro G, Hosoi M, Pellegrini L, et al.: A controlled study of a lecithinized delivery system of curcumin (Meriva®) to alleviate the adverse effects of cancer treatment. Phytother Res 28 (3): 444-50, 2014.23775598
Zaidi A, Lai M, Cavenagh J: Long-term stabilisation of myeloma with curcumin. BMJ Case Rep 2017: , 2017.28413157
Dhillon N, Aggarwal BB, Newman RA, et al.: Phase II trial of curcumin in patients with advanced pancreatic cancer. Clin Cancer Res 14 (14): 4491-9, 2008.18628464
Demiray M, Sahinbas H, Atahan S, et al.: Successful treatment of c-kit-positive metastatic Adenoid Cystic Carcinoma (ACC) with a combination of curcumin plus imatinib: A case report. Complement Ther Med 27: 108-13, 2016.27515884
Bayet-Robert M, Kwiatkowski F, Leheurteur M, et al.: Phase I dose escalation trial of docetaxel plus curcumin in patients with advanced and metastatic breast cancer. Cancer Biol Ther 9 (1): 8-14, 2010.19901561
Passildas-Jahanmohan J, Eymard JC, Pouget M, et al.: Multicenter randomized phase II study comparing docetaxel plus curcumin versus docetaxel plus placebo in first-line treatment of metastatic castration-resistant prostate cancer. Cancer Med 10 (7): 2332-2340, 2021.33666378
Epelbaum R, Schaffer M, Vizel B, et al.: Curcumin and gemcitabine in patients with advanced pancreatic cancer. Nutr Cancer 62 (8): 1137-41, 2010.21058202
Pastorelli D, Fabricio ASC, Giovanis P, et al.: Phytosome complex of curcumin as complementary therapy of advanced pancreatic cancer improves safety and efficacy of gemcitabine: Results of a prospective phase II trial. Pharmacol Res 132: 72-79, 2018.29614381
Kanai M, Yoshimura K, Asada M, et al.: A phase I/II study of gemcitabine-based chemotherapy plus curcumin for patients with gemcitabine-resistant pancreatic cancer. Cancer Chemother Pharmacol 68 (1): 157-64, 2011.20859741
James MI, Iwuji C, Irving G, et al.: Curcumin inhibits cancer stem cell phenotypes in ex vivo models of colorectal liver metastases, and is clinically safe and tolerable in combination with FOLFOX chemotherapy. Cancer Lett 364 (2): 135-41, 2015.25979230
Howells LM, Iwuji COO, Irving GRB, et al.: Curcumin Combined with FOLFOX Chemotherapy Is Safe and Tolerable in Patients with Metastatic Colorectal Cancer in a Randomized Phase IIa Trial. J Nutr 149 (7): 1133-1139, 2019.31132111
Hassell LA, Roanh le D: Potential response to curcumin in infantile hemangioendothelioma of the liver. Pediatr Blood Cancer 55 (2): 377-9, 2010.20582974
Ryan JL, Heckler CE, Ling M, et al.: Curcumin for radiation dermatitis: a randomized, double-blind, placebo-controlled clinical trial of thirty breast cancer patients. Radiat Res 180 (1): 34-43, 2013.23745991
Ryan Wolf J, Heckler CE, Guido JJ, et al.: Oral curcumin for radiation dermatitis: a URCC NCORP study of 686 breast cancer patients. Support Care Cancer 26 (5): 1543-1552, 2018.29192329
Rao S, Hegde SK, Baliga-Rao MP, et al.: Sandalwood Oil and Turmeric-Based Cream Prevents Ionizing Radiation-Induced Dermatitis in Breast Cancer Patients: Clinical Study. Medicines (Basel) 4 (3): , 2017.28930259
Elad S, Meidan I, Sellam G, et al.: Topical curcumin for the prevention of oral mucositis in pediatric patients: case series. Altern Ther Health Med 19 (3): 21-4, 2013 May-Jun.23709456
Francis M, Williams S: Effectiveness of Indian Turmeric Powder with Honey as Complementary Therapy on Oral Mucositis : A Nursing Perspective among Cancer Patients in Mysore. Nurs J India 105 (6): 258-60, 2014 Nov-Dec.26182820
Rao S, Dinkar C, Vaishnav LK, et al.: The Indian Spice Turmeric Delays and Mitigates Radiation-Induced Oral Mucositis in Patients Undergoing Treatment for Head and Neck Cancer: An Investigational Study. Integr Cancer Ther 13 (3): 201-10, 2014.24165896
Delavarian Z, Pakfetrat A, Ghazi A, et al.: Oral administration of nanomicelle curcumin in the prevention of radiotherapy-induced mucositis in head and neck cancers. Spec Care Dentist 39 (2): 166-172, 2019.30761565
Arun P, Sagayaraj A, Azeem Mohiyuddin SM, et al.: Role of turmeric extract in minimising mucositis in patients receiving radiotherapy for head and neck squamous cell cancer: a randomised, placebo-controlled trial. J Laryngol Otol : 1-6, 2020.32029014

## Adverse Effects

Most clinical studies of curcuma-containing products have demonstrated few, if any, associated adverse effects. In one small study (N = 17) of patients who received a curcumin-containing product along with gemcitabine chemotherapy, about 30% of patients (N = 5) who received 8,000 mg/day of the curcumin-containing product discontinued the product because of intractable abdominal fullness. Two other patients had a dose reduction to 4,000 mg, also because of abdominal complaints.[1] In this study, seven patients had grade 3 gastrointestinal toxicity and two patients had grade 2 gastrointestinal toxicity.

Table 9. Curcumin-Containing Products With Reported Adverse Effects

Source | Description of Curcuminoid-Containing Product | Supplier | Type of Product^a^
[1] | Each capsule contained 500 mg of curcuminoids (curcumin 450 mg, demethoxycurcumin 40 mg, and bisdemethoxycurcumin 10 mg) | Sabinsa Corp. (Piscataway, NJ) | TE

TE = turmeric extract.

^a^For a more detailed definition of these terms, see the General Information and History section.

### References

Epelbaum R, Schaffer M, Vizel B, et al.: Curcumin and gemcitabine in patients with advanced pancreatic cancer. Nutr Cancer 62 (8): 1137-41, 2010.21058202

## Summary of the Evidence for Curcumin (Curcuma, Turmeric)

To assist readers in evaluating the results of human studies of integrative, alternative, and complementary therapies for cancer, the strength of the evidence (i.e., the levels of evidence) associated with each type of treatment is provided whenever possible. To qualify for a level of evidence analysis, a study must:

- Be published in a peer-reviewed scientific journal.
- Report on therapeutic outcome or outcomes, such as tumor response, improvement in survival, or measured improvement in quality of life.
- Describe clinical findings in sufficient detail for a meaningful evaluation to be made.

Separate levels of evidence scores are assigned to qualifying human studies on the basis of statistical strength of the study design and scientific strength of the treatment outcomes (i.e., endpoints) measured. The resulting two scores are then combined to produce an overall score. For an explanation of the scores and additional information about levels of evidence analysis of CAM treatments for cancer, see Levels of Evidence for Human Studies of Integrative, Alternative, and Complementary Therapies.

## Latest Updates to This Summary (10/31/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the use of curcumin in the treatment of people with cancer.. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Integrative, Alternative, and Complementary Therapies Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Curcumin (Curcuma, Turmeric) and Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/hp/curcumin-pdq. Accessed <MM/DD/YYYY>. [PMID: 33651529]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).